# DDX41-Associated Myeloid Malignancies (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of DDX41-associated myeloid malignancies. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction and Clinical Manifestations of DDX41-Associated Myeloid Malignancies

Germline pathogenic variants in the RNA helicase, DDX41, are associated with an autosomal dominant predisposition to myeloid malignancies and other cancers. The prevalence of DDX41 germline pathogenic variants is not clearly defined. However, these variants are thought to underlie 1% to 1.5% of all acute myeloid leukemia (AML) diagnoses,[1] making it one of the most commonly inherited predispositions to adult-onset myeloid malignancies.[2] Individuals who inherit DDX41 pathogenic variants have an increased lifetime risk to develop myelodysplastic syndrome (MDS) and AML. However, lymphoid malignancies such as non-Hodgkin lymphoma and myeloproliferative neoplasm (MPN) have also been reported in individuals with DDX41 pathogenic variants.[3-5]

DDX41 germline pathogenic variants are associated with a later median age of MDS/AML diagnosis than other inherited hematologic predisposition syndromes.[6] For DDX41 carriers, the age of MDS/AML diagnosis can range from 61 to 69 years. This age range is similar to the typical age of diagnosis in patients with sporadic MDS/AML in the general population. The myeloid malignancies that occur in individuals with DDX41 germline pathogenic variants are almost always diploid and harbor lower somatic mutational burdens than those seen in individuals without DDX41 germline pathogenic variants.[4,6] The penetrance of DDX41 pathogenic variants is incomplete and variable. DDX41 pathogenic variants are associated with a mild to moderate predisposition to hematologic malignancies (lifetime risk of hematologic malignancies ranges from 20% to 30% in DDX41 carriers). Nearly half of reported DDX41 carriers develop long-standing asymptomatic cytopenias (most commonly leukopenia) prior to malignancy development. However, some DDX41 carriers will only ever develop stable cytopenias that never progress to become hematologic malignancies. In these cases, individuals are typically transfusion-independent.[2]

Since DDX41 pathogenic variants have low penetrance and DDX41-related hematologic malignancies are often diagnosed at later ages, DDX41 carriers can be difficult to identify using the typical age– or family history–related screening criteria.

### References

Polprasert C, Schulze I, Sekeres MA, et al.: Inherited and Somatic Defects in DDX41 in Myeloid Neoplasms. Cancer Cell 27 (5): 658-70, 2015.25920683
Sébert M, Passet M, Raimbault A, et al.: Germline DDX41 mutations define a significant entity within adult MDS/AML patients. Blood 134 (17): 1441-1444, 2019.31484648
Lewinsohn M, Brown AL, Weinel LM, et al.: Novel germ line DDX41 mutations define families with a lower age of MDS/AML onset and lymphoid malignancies. Blood 127 (8): 1017-23, 2016.26712909
Li P, Brown S, Williams M, et al.: The genetic landscape of germline DDX41 variants predisposing to myeloid neoplasms. Blood 140 (7): 716-755, 2022.35671390
Goyal T, Tu ZJ, Wang Z, et al.: Clinical and Pathologic Spectrum of DDX41-Mutated Hematolymphoid Neoplasms. Am J Clin Pathol 156 (5): 829-838, 2021.33929502
Quesada AE, Routbort MJ, DiNardo CD, et al.: DDX41 mutations in myeloid neoplasms are associated with male gender, TP53 mutations and high-risk disease. Am J Hematol 94 (7): 757-766, 2019.30963592

## Genetics and Molecular Biology of DDX41-Associated Myeloid Malignancies

DDX41 somatic variants occur in myeloid and lymphoid malignancies and are increasingly included as part of somatic next-generation sequencing (NGS) panels. Studies have shown that molecular profiling is a useful and feasible tool to screen patients with hematologic malignancies for germline DDX41 pathogenic variants.[1,2] Two common Northern European founder pathogenic variants, p.Asp140Glyfs*2 and p.Met1Ile, account for most DDX41 germline pathogenic variants identified in individuals with European ancestry. As genetic testing becomes more routine, testing in additional populations indicates that missense variants, like DDX41 p.Val152Gly (p.V152G) and DDX41 p.Tyr259Cys (p.Y259C), may be more common in non-European populations.[3] When these missense and founder variants are found on somatic testing, they are present in the germline nearly 100% of the time. However, multiple nonsense and frameshift germline variants have been reported throughout the DDX41 gene. Therefore, full DDX41 gene sequencing is indicated when evaluating for a germline pathogenic variant.

In nearly 80% of cases, a second, somatically-acquired variant (often the DDX41 p.Arg525His [p.R525H] variant), is acquired on the other DDX41 allele. This second hit is associated with progression to hematologic malignancy.[4,5] Likewise, if the DDX41 p.Arg525His variant is detected on somatic testing, even in absence of an additional DDX41 variant (presumably on the other allele), germline testing is warranted. Germline pathogenic variants on the other DDX41 allele could be present, especially when full somatic sequencing of the gene is not performed.

### References

Sébert M, Passet M, Raimbault A, et al.: Germline DDX41 mutations define a significant entity within adult MDS/AML patients. Blood 134 (17): 1441-1444, 2019.31484648
Bannon SA, Routbort MJ, Montalban-Bravo G, et al.: Next-Generation Sequencing of DDX41 in Myeloid Neoplasms Leads to Increased Detection of Germline Alterations. Front Oncol 10: 582213, 2020.33585199
Choi EJ, Cho YU, Hur EH, et al.: Unique ethnic features of DDX41 mutations in patients with idiopathic cytopenia of undetermined significance, myelodysplastic syndrome, or acute myeloid leukemia. Haematologica 107 (2): 510-518, 2022.33626862
Polprasert C, Schulze I, Sekeres MA, et al.: Inherited and Somatic Defects in DDX41 in Myeloid Neoplasms. Cancer Cell 27 (5): 658-70, 2015.25920683
Duployez N, Largeaud L, Duchmann M, et al.: Prognostic impact of DDX41 germline mutations in intensively treated acute myeloid leukemia patients: an ALFA-FILO study. Blood 140 (7): 756-768, 2022.35443031

## Management and Prognosis for DDX41-Associated Myeloid Malignancies

Emerging data suggest that DDX41 carriers who develop acute myeloid leukemia (AML) have higher complete remission rates and longer mean overall survival rates than individuals who do not carry a DDX41 pathogenic variant.[1-3] In addition, individuals with DDX41 germline pathogenic variants who develop myelodysplastic syndrome (MDS)/AML may show responses to treatment with lenalidomide.[3-6]

At least two cases of donor-derived leukemias have occurred in DDX41 carriers post–hematopoietic stem cell transplant (HSCT) from a matched-related donor carrying the same germline DDX41 pathogenic variant.[7,8] This highlights the need for systematic screening of germline DDX41 pathogenic variants in MDS/AML patients prior to HSCT. This will allow for appropriate donor selection and donor screening.

### References

Li P, Brown S, Williams M, et al.: The genetic landscape of germline DDX41 variants predisposing to myeloid neoplasms. Blood 140 (7): 716-755, 2022.35671390
Duployez N, Largeaud L, Duchmann M, et al.: Prognostic impact of DDX41 germline mutations in intensively treated acute myeloid leukemia patients: an ALFA-FILO study. Blood 140 (7): 756-768, 2022.35443031
Alkhateeb HB, Nanaa A, Viswanatha D, et al.: Genetic features and clinical outcomes of patients with isolated and comutated DDX41-mutated myeloid neoplasms. Blood Adv 6 (2): 528-532, 2022.34644397
Polprasert C, Schulze I, Sekeres MA, et al.: Inherited and Somatic Defects in DDX41 in Myeloid Neoplasms. Cancer Cell 27 (5): 658-70, 2015.25920683
Abou Dalle I, Kantarjian H, Bannon SA, et al.: Successful lenalidomide treatment in high risk myelodysplastic syndrome with germline DDX41 mutation. Am J Hematol 95 (2): 227-229, 2020.31400013
Negoro E, Radivoyevitch T, Polprasert C, et al.: Molecular predictors of response in patients with myeloid neoplasms treated with lenalidomide. Leukemia 30 (12): 2405-2409, 2016.27560106
Kobayashi S, Kobayashi A, Osawa Y, et al.: Donor cell leukemia arising from preleukemic clones with a novel germline DDX41 mutation after allogenic hematopoietic stem cell transplantation. Leukemia 31 (4): 1020-1022, 2017.28194039
Berger G, van den Berg E, Sikkema-Raddatz B, et al.: Re-emergence of acute myeloid leukemia in donor cells following allogeneic transplantation in a family with a germline DDX41 mutation. Leukemia 31 (2): 520-522, 2017.27795557

## Latest Updates to This Summary (11/25/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about DDX41-associated myeloid malignancies. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for DDX41-Associated Myeloid Malignancies are:

- Julia Cooper, MS, CGC (Ohio State University)
- Courtney DiNardo, MD, MSC (University of Texas, M.D. Anderson Cancer Center)
- Marcin Wlodarski, MD, PhD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ DDX41-Associated Myeloid Malignancies. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/ddx41-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 38113347]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).